# Wilms Tumor and Other Childhood Kidney Tumors Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of Wilms tumor and other childhood kidney tumors. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Wilms Tumor and Other Childhood Kidney Tumors

Key Points for This Section
- Childhood kidney tumors are diseases in which malignant (cancer) cells form in the tissues of the kidney.
- There are many types of childhood kidney tumors.
  - Wilms Tumor
  - Renal Cell Cancer (RCC)
  - Rhabdoid Tumor of the Kidney
  - Clear Cell Sarcoma of the Kidney
  - Congenital Mesoblastic Nephroma
  - Ewing Sarcoma of the Kidney
  - Primary Renal Myoepithelial Carcinoma
  - Cystic Partially Differentiated Nephroblastoma
  - Multilocular Cystic Nephroma
  - Primary Renal Synovial Sarcoma
  - Anaplastic Sarcoma of the Kidney
- Nephroblastomatosis is not cancer but may become Wilms tumor.
- Having certain genetic syndromes, other conditions, or environmental exposures can increase the risk of Wilms tumor.
- Tests are used to screen for Wilms tumor.
- Having certain conditions may increase the risk of renal cell cancer.
- Treatment for Wilms tumor and other childhood kidney tumors may include genetic counseling.
- Signs of Wilms tumor and other childhood kidney tumors include a lump in the abdomen and blood in the urine.
- Tests that examine the kidney and the blood are used to diagnose Wilms tumor and other childhood kidney tumors.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Childhood kidney tumors are diseases in which malignant (cancer) cells form in the tissues of the kidney.

There are two kidneys, one on each side of the spine, above the waist. Tiny tubules in the kidneys filter and clean the blood. They take out waste products and make urine. The urine passes from each kidney through a long tube called a ureter into the bladder. The bladder holds the urine until it passes through the urethra and leaves the body.

Anatomy of the urinary system showing the kidneys, ureters, bladder, and urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown is the spine and adrenal glands. Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.

Anatomy of the urinary system; drawing showing the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. The spine and adrenal glands are also shown.

### There are many types of childhood kidney tumors.

#### Wilms Tumor

In Wilms tumor, one or more tumors may be found in one or both kidneys. Wilms tumor may spread to the lungs, liver, bone, brain, or nearby lymph nodes. In children and adolescents younger than 15 years old, most kidney cancers are Wilms tumors.

#### Renal Cell Cancer (RCC)

Renal cell cancer is rare in children and adolescents younger than 15 years old. It is much more common in adolescents between 15 and 19 years old. Children and adolescents are more likely to be diagnosed with a large renal cell tumor or cancer that has spread. Renal cell cancers may spread to the lungs, liver, bone, or lymph nodes. Renal cell cancer may also be called renal cell carcinoma.

#### Rhabdoid Tumor of the Kidney

Rhabdoid tumor of the kidney is a type of kidney cancer that occurs mostly in infants and young children. It is often advanced at the time of diagnosis. Rhabdoid tumor of the kidney grows and spreads quickly, often to the lungs or brain.

Children with a certain change in the SMARCB1 gene can also have tumors grow in the kidney, brain, or soft tissues. These children are checked regularly to see if a rhabdoid tumor has formed in the kidney or the brain:

- Children from birth or diagnosis to 5 years old have an MRI of the brain and spine and an ultrasound of the abdomen every 3 months.

#### Clear Cell Sarcoma of the Kidney

Clear cell sarcoma of the kidney is an uncommon kidney cancer that may spread to the bone, lungs, brain, liver, or soft tissue. It occurs most often before age 3 years. It may recur (come back) up to 14 years after treatment, often in the brain or lung.

#### Congenital Mesoblastic Nephroma

Congenital mesoblastic nephroma is a tumor of the kidney that is often diagnosed during the first year of life or before birth. It is the most common kidney tumor found in infants younger than 6 months old and is found more often in males than in females. It can usually be cured.

#### Ewing Sarcoma of the Kidney

Ewing sarcoma (previously called neuroepithelial tumor) of the kidney is rare and usually occurs in young adults. This cancer grows and spreads to other parts of the body quickly.

#### Primary Renal Myoepithelial Carcinoma

Primary renal myoepithelial carcinoma is a rare type of cancer that usually affects soft tissues, but sometimes forms in the internal organs (such as the kidney). This type of cancer grows and spreads quickly.

#### Cystic Partially Differentiated Nephroblastoma

Cystic partially differentiated nephroblastoma is a very rare type of Wilms tumor made up of cysts.

#### Multilocular Cystic Nephroma

Multilocular cystic nephromas are benign tumors made up of cysts and are most common in infants, young children, and adult women. These tumors can occur in one or both kidneys.

Children with this type of tumor also may have pleuropulmonary blastoma, so imaging tests that check the lungs for cysts or solid tumors are done. Since multilocular cystic nephroma may be an inherited condition, genetic counseling and genetic testing may be considered. See the PDQ summary about Childhood Pleuropulmonary Blastoma Treatment for more information.

#### Primary Renal Synovial Sarcoma

Primary renal synovial sarcoma is a cyst-like tumor of the kidney and is most common in young adults. These tumors grow and spread quickly.

#### Anaplastic Sarcoma of the Kidney

Anaplastic sarcoma of the kidney is a rare tumor that is most common in children or adolescents younger than 15 years of age. Anaplastic sarcoma of the kidney often spreads to the lungs, liver, or bones. Imaging tests that check the lungs for cysts or solid tumors may be done. Since anaplastic sarcoma may be an inherited condition, genetic counseling and genetic testing may be considered.

### Nephroblastomatosis is not cancer but may become Wilms tumor.

Sometimes, after the kidneys form in the fetus, abnormal groups of kidney cells remain in one or both kidneys. In nephroblastomatosis (diffuse hyperplastic perilobar nephroblastomatosis), these abnormal groups of cells may grow in many places inside the kidney or make a thick layer around the kidney. When these groups of abnormal cells are found in a kidney after it was removed for Wilms tumor, the child has an increased risk of Wilms tumor in the other kidney. Frequent follow-up testing is important at least every 3 months, for at least 7 years after the child is diagnosed or treated.

### Having certain genetic syndromes, other conditions, or environmental exposures can increase the risk of Wilms tumor.

Anything that increases the risk of getting a disease is called a risk factor. Having a risk factor does not mean that you will get cancer; not having risk factors doesn't mean that you will not get cancer. Talk to your child's doctor if you think your child may be at risk.

Wilms tumor may be part of a genetic syndrome that affects growth or development. A genetic syndrome is a set of signs and symptoms or conditions that occur together and is caused by certain changes in the genes. Certain conditions or environmental exposures can also increase a child's risk of developing Wilms tumor. The following have been linked to Wilms tumor:

- WAGR syndrome (Wilms tumor, aniridia, abnormal genitourinary system, and mental disability).
- Denys-Drash syndrome (abnormal genitourinary system).
- Frasier syndrome (abnormal genitourinary system).
- Beckwith-Wiedemann syndrome (abnormally large growth of one or more body parts, large tongue, umbilical hernia at birth, and abnormal genitourinary system).
- A family history of Wilms tumor.
- Aniridia (part or all of the iris, the colored part of the eye, is missing).
- Isolated hemihyperplasia (abnormally large growth of one or more body parts).
- Urinary tract problems such as cryptorchidism or hypospadias.
- The child's mother being exposed to pesticides while she was pregnant.

### Tests are used to screen for Wilms tumor.

Screening tests are done in children with an increased risk of Wilms tumor. These tests may help find cancer early and decrease the chance of dying from cancer.

In general, children with an increased risk of Wilms tumor should be screened for Wilms tumor every 3 months until they are at least 8 years old. An ultrasound test of the abdomen is usually used for screening. Small Wilms tumors may be found and removed before symptoms occur.

Children with Beckwith-Wiedemann syndrome or hemihyperplasia are also screened for liver and adrenal tumors that are linked to these genetic syndromes. A test to check the alpha-fetoprotein (AFP) level in the blood and an ultrasound of the abdomen are done until the child is 4 years old. An ultrasound of the kidneys is done between the ages of 4 and 7 years old. A physical exam by a specialist (geneticist or pediatric oncologist) is done two times each year. In children with certain gene changes, a different schedule for ultrasound of the abdomen may be used.

Children with aniridia and a certain gene change are screened for Wilms tumor every 3 months until they are 8 years old. An ultrasound test of the abdomen is used for screening.

Some children develop Wilms tumor in both kidneys. These often appear when Wilms tumor is first diagnosed, but Wilms tumor may also occur in the second kidney after the child is successfully treated for Wilms tumor in one kidney. Children with an increased risk of a second Wilms tumor in the other kidney should be screened for Wilms tumor every 3 months for up to 8 years. An ultrasound test of the abdomen may be used for screening.

### Having certain conditions may increase the risk of renal cell cancer.

Renal cell cancer may be related to the following conditions:

- Von Hippel-Lindau disease (an inherited condition that causes abnormal growth of blood vessels). Children with Von Hippel-Lindau disease should be checked yearly for renal cell cancer with an ultrasound of the abdomen or an MRI (magnetic resonance imaging) beginning at age 8 to 11 years.
- Tuberous sclerosis (an inherited disease marked by noncancerous fatty cysts in the kidney).
- Familial renal cell cancer (an inherited condition that occurs when certain changes in the genes that cause kidney cancer are passed down from the parent to the child).
- Renal medullary cancer (a rare kidney cancer that grows and spreads quickly).
- Hereditary leiomyomatosis (an inherited disorder that increases the risk of having cancer of the kidney, skin, and uterus).

Prior chemotherapy or radiation therapy for a childhood cancer, such as neuroblastoma, soft tissue sarcoma, leukemia, or Wilms tumor may also increase the risk of renal cell cancer. See the Second Cancers section in the PDQ summary about Late Effects of Treatment for Childhood Cancer for more information.

### Treatment for Wilms tumor and other childhood kidney tumors may include genetic counseling.

Genetic counseling (a discussion with a trained professional about genetic diseases and whether genetic testing is needed) may be done if the child has one of the following syndromes or conditions:

- A genetic syndrome or condition that increases the risk of Wilms tumor.
- An inherited condition that increases the risk of renal cell cancer.
- Rhabdoid tumor of the kidney.
- Multilocular cystic nephroma.
- Anaplastic sarcoma of the kidney.

### Signs of Wilms tumor and other childhood kidney tumors include a lump in the abdomen and blood in the urine.

Sometimes childhood kidney tumors do not cause signs and symptoms and the parent finds a mass in the abdomen by chance or the mass is found during a well-child health check-up. These and other signs and symptoms may be caused by kidney tumors or by other conditions. Check with your child's doctor if your child has any of the following:

- A lump, swelling, or pain in the abdomen.
- Blood in the urine.
- High blood pressure (headache, feeling very tired, chest pain, or trouble seeing or breathing).
- Hypercalcemia (loss of appetite, nausea and vomiting, weakness, or feeling very tired).
- Fever for no known reason.
- Loss of appetite.
- Weight loss for no known reason.

Wilms tumor that has spread to the lungs or liver may cause the following signs and symptoms:

- Cough.
- Blood in the sputum.
- Trouble breathing.
- Pain in the abdomen.

### Tests that examine the kidney and the blood are used to diagnose Wilms tumor and other childhood kidney tumors.

The following tests and procedures may be used:

- Physical exam and health history: An exam of the body to check general signs of health, including checking for signs of disease, such as lumps or anything else that seems unusual. A history of the patient’s health habits and past illnesses and treatments will also be taken.
- Complete blood count (CBC): A procedure in which a sample of blood is drawn and checked for the following:
  - The number of red blood cells, white blood cells, and platelets.
  - The amount of hemoglobin (the protein that carries oxygen) in the red blood cells.
  - The portion of the blood sample made up of red blood cells.
- Blood chemistry studies: A procedure in which a blood sample is checked to measure the amounts of certain substances released into the blood by organs and tissues in the body. An unusual (higher or lower than normal) amount of a substance can be a sign of disease. This test is done to check how well the liver and kidneys are working.
- Renal function test: A procedure in which blood or urine samples are checked to measure the amounts of certain substances released into the blood or urine by the kidneys. A higher or lower than normal amount of a substance can be a sign that the kidneys are not working as they should.
- Urinalysis: A test to check the color of urine and its contents, such as sugar, protein, blood, and bacteria.
- Ultrasound exam: A procedure in which high-energy sound waves (ultrasound) are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. An ultrasound of the abdomen is done to diagnose a kidney tumor.
  Abdominal ultrasound. An ultrasound transducer connected to a computer is pressed against the skin of the abdomen. The transducer bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).
  Abdominal ultrasound; drawing shows a child lying on an exam table during an abdominal ultrasound procedure. A technician is shown pressing a transducer (a device that makes sound waves that bounce off tissues inside the body) against the skin of the abdomen. A computer screen shows a sonogram (picture).
- CT scan (CAT scan): A procedure that makes a series of detailed pictures of areas inside the body, such as the chest, abdomen, and pelvis, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye is injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
  Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.
  Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.
- MRI (magnetic resonance imaging) with gadolinium: A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body, such as the abdomen. A substance called gadolinium is injected into a vein. The gadolinium collects around the cancer cells so they show up brighter in the picture. This procedure is also called nuclear magnetic resonance imaging (NMRI).
  Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.
  Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.
- X-ray: An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body, such as the chest and abdomen.
- PET-CT scan: A procedure that combines the pictures from a positron emission tomography (PET) scan and a computed tomography (CT) scan. The PET and CT scans are done at the same time on the same machine. The pictures from both scans are combined to make a more detailed picture than either test would make by itself. A PET scan is a procedure to find malignant tumor cells in the body. A small amount of radioactive glucose (sugar) is injected into a vein. The PET scanner rotates around the body and makes a picture of where glucose is being used in the body. Malignant tumor cells show up brighter in the picture because they are more active and take up more glucose than normal cells do.
- Biopsy: The removal of cells or tissues so they can be viewed under a microscope by a pathologist to check for signs of cancer. The decision of whether to do a biopsy is based on the following:
  - The size of the tumor.
  - The stage of the cancer. If the tumor appears to be resectable or stage I or stage II Wilms tumor, a biopsy is not done to avoid tumor cells being spread during the procedure.
  - Whether cancer is in one or both kidneys.
  - Whether imaging tests clearly show the cancer.
  - Whether the patient is in a clinical trial.
  A biopsy may be done before any treatment is given, after chemotherapy to shrink the tumor, or after surgery to remove the tumor.

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis and treatment options for Wilms tumor depend on the following:

- How different the tumor cells are from normal kidney cells when looked at under a microscope.
- The stage of the cancer.
- The type of tumor.
- The age of the child.
- Whether the tumor can be completely removed by surgery.
- Whether there are certain changes in chromosomes or genes.
- Whether the cancer has just been diagnosed or has recurred (come back).

The prognosis for renal cell cancer depends on the following:

- The stage of the cancer.
- Whether the cancer has spread to the lymph nodes.

The prognosis for rhabdoid tumor of the kidney depends on the following:

- The age of the child at the time of diagnosis.
- The stage of the cancer.
- Whether the cancer has spread to the brain or spinal cord.

The prognosis for clear cell sarcoma of the kidney depends on the following:

- The age of the child at the time of diagnosis.
- The stage of the cancer.

## Stages of Wilms Tumor

Key Points for This Section
- Wilms tumors are staged during surgery and with imaging tests.
- There are three ways that cancer spreads in the body.
- Cancer may spread from where it began to other parts of the body.
- In addition to the stages, Wilms tumors are described by their histology.
- The following stages are used for both favorable histology and anaplastic Wilms tumors:
  - Stage I
  - Stage II
  - Stage III
  - Stage IV
  - Stage V (bilateral)
- Sometimes Wilms tumor and other childhood kidney tumors come back after treatment.

### Wilms tumors are staged during surgery and with imaging tests.

The process used to find out if cancer has spread outside of the kidney to other parts of the body is called staging. The information gathered from the staging process determines the stage of the disease. The results of the tests and procedures done to diagnose and stage Wilms tumor are used to help make decisions about treatment.

There is no staging for the other types of childhood kidney tumors. The treatment of these tumors depends on the tumor type.

The following tests may be done to see if cancer has spread to other places in the body:

- Lymph node biopsy: The removal of all or part of a lymph node in the abdomen. A pathologist views the lymph node tissue under a microscope to check for cancer cells. This procedure is also called lymphadenectomy or lymph node dissection.
- Liver function test: A procedure in which a blood sample is checked to measure the amounts of certain substances released into the blood by the liver. A higher than normal amount of a substance can be a sign that the liver is not working as it should.
- X-ray of the chest and bones: An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body, such as the chest.
- CT scan (CAT scan): A procedure that makes a series of detailed pictures of areas inside the body, such as the abdomen, pelvis, chest, and brain, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye is injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
- PET-CT scan: A procedure that combines the pictures from a positron emission tomography (PET) scan and a computed tomography (CT) scan. The PET and CT scans are done at the same time on the same machine. The pictures from both scans are combined to make a more detailed picture than either test would make by itself. A PET scan is a procedure to find malignant tumor cells in the body. A small amount of radioactive glucose (sugar) is injected into a vein. The PET scanner rotates around the body and makes a picture of where glucose is being used in the body. Malignant tumor cells show up brighter in the picture because they are more active and take up more glucose than normal cells do.
- MRI (magnetic resonance imaging): A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body, such as the abdomen, pelvis, and brain. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- Bone scan: A procedure to check if there are rapidly dividing cells, such as cancer cells, in the bone. A very small amount of radioactive material is injected into a vein and travels through the bloodstream. The radioactive material collects in the bones with cancer and is detected by a scanner.
  Bone scan. A small amount of radioactive material is injected into the child's vein and travels through the blood. The radioactive material collects in the bones. As the child lies on a table that slides under the scanner, the radioactive material is detected and images are made on a computer screen.
  Bone scan; drawing shows a child lying on a table that slides under the scanner, a technician operating the scanner, and a computer monitor that will show images made during the scan.
- Ultrasound exam: A procedure in which high-energy sound waves (ultrasound) are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. An ultrasound of the major heart vessels is done to stage Wilms tumor.
- Cystoscopy: A procedure to look inside the bladder and urethra to check for abnormal areas. A cystoscope is inserted through the urethra into the bladder. A cystoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue samples, which are checked under a microscope for signs of cancer.

### There are three ways that cancer spreads in the body.

Cancer can spread through tissue, the lymph system, and the blood:

- Tissue. The cancer spreads from where it began by growing into nearby areas.
- Lymph system. The cancer spreads from where it began by getting into the lymph system. The cancer travels through the lymph vessels to other parts of the body.
- Blood. The cancer spreads from where it began by getting into the blood. The cancer travels through the blood vessels to other parts of the body.

### Cancer may spread from where it began to other parts of the body.

When cancer spreads to another part of the body, it is called metastasis. Cancer cells break away from where they began (the primary tumor) and travel through the lymph system or blood.

- Lymph system. The cancer gets into the lymph system, travels through the lymph vessels, and forms a tumor (metastatic tumor) in another part of the body.
- Blood. The cancer gets into the blood, travels through the blood vessels, and forms a tumor (metastatic tumor) in another part of the body.

The metastatic tumor is the same type of cancer as the primary tumor. For example, if Wilms tumor spreads to the lung, the cancer cells in the lung are actually Wilms tumor cells. The disease is metastatic Wilms tumor, not lung cancer.

metastasis: how cancer spreads

Many cancer deaths are caused when cancer moves from the original tumor and spreads to other tissues and organs. This is called metastatic cancer. This animation shows how cancer cells travel from the place in the body where they first formed to other parts of the body.

YouTube (https://www.youtube.com/watch?v=fQwar_-QdiQ)

### In addition to the stages, Wilms tumors are described by their histology.

The histology (how the cells look under a microscope) of the tumor affects the prognosis and the treatment of Wilms tumor. The histology may be favorable or anaplastic (unfavorable). Tumors with a favorable histology have a better prognosis and respond better to chemotherapy than anaplastic tumors. Tumor cells that are anaplastic divide quickly and under a microscope do not look like the type of cells they came from. Anaplastic tumors are harder to treat with chemotherapy than other Wilms tumors at the same stage.

### The following stages are used for both favorable histology and anaplastic Wilms tumors:

#### Stage I

In stage I, the tumor was completely removed by surgery and all of the following are true:

- Cancer was found only in the kidney and did not spread to blood vessels in the renal sinus (the part of the kidney where it joins the ureter) or to the lymph nodes.
- No cancer cells were found at the edges of the area where the tumor was removed.
- The outer layer of the kidney did not break open.
- The tumor did not break open.
- A biopsy was not done before the tumor was removed.

#### Stage II

In stage II, the tumor was completely removed by surgery and no cancer cells were found at the edges of the area where the cancer was removed. Cancer has not spread to lymph nodes. Before the tumor was removed, one of the following was true:

- Cancer had spread to the renal sinus (the part of the kidney where it joins the ureter).
- Cancer had spread to blood vessels outside the area of the kidney where urine is made, such as the renal sinus.

#### Stage III

In stage III, cancer remains in the abdomen after surgery and at least one of the following is true:

- Cancer has spread to lymph nodes in the abdomen or pelvis (the part of the body between the hips).
- Cancer has spread to or through the surface of the peritoneum (the tissue that lines the abdominal cavity and covers most organs in the abdomen).
- A biopsy of the tumor was done before it was removed.
- The tumor broke open before or during surgery to remove it.
- The tumor was removed in more than one piece.
- Cancer cells are found at the edges of the area where the tumor was removed.
- The entire tumor could not be removed because important organs or tissues in the body would be damaged.

#### Stage IV

In stage IV, cancer has spread through the blood to organs such as the lungs, liver, bone, or brain, or to lymph nodes outside the abdomen and pelvis.

#### Stage V (bilateral)

In stage V (bilateral) Wilms tumor, cancer cells are found in both kidneys when the cancer is first diagnosed. The cancer in each kidney is staged separately as stage I, II, III, or IV.

### Sometimes Wilms tumor and other childhood kidney tumors come back after treatment.

Childhood Wilms tumor may recur (come back) in the lungs, abdomen, liver, or other places in the body.

Childhood clear cell sarcoma of the kidney may recur in the brain, lungs, or other places in the body.

Childhood congenital mesoblastic nephroma may recur in the kidneys or in other places in the body.

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for patients with Wilms tumor and other childhood kidney tumors.
- Children with Wilms tumor or other childhood kidney tumors should have their treatment planned by a team of health care providers who are experts in treating cancer in children.
- Six types of treatment are used:
  - Surgery
  - Radiation therapy
  - Chemotherapy
  - Immunotherapy
  - High-dose chemotherapy with stem cell rescue
  - Targeted therapy
- New types of treatment are being tested in clinical trials.
- Treatment for Wilms tumor and other childhood kidney tumors may cause side effects.
- Patients may want to think about taking part in a clinical trial.
- Patients can enter clinical trials before, during, or after starting their cancer treatment.
- Follow-up tests may be needed.

### There are different types of treatment for patients with Wilms tumor and other childhood kidney tumors.

Different types of treatment are available for children with Wilms and other childhood kidney tumors. Some treatments are standard (the currently used treatment), and some are being tested in clinical trials. A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for patients with cancer. When clinical trials show that a new treatment is better than the standard treatment, the new treatment may become the standard treatment.

Because cancer in children is rare, taking part in a clinical trial should be considered. Some clinical trials are open only to patients who have not started treatment.

### Children with Wilms tumor or other childhood kidney tumors should have their treatment planned by a team of health care providers who are experts in treating cancer in children.

Your child's treatment will be overseen by a pediatric oncologist, a doctor who specializes in treating children with cancer. The pediatric oncologist works with other pediatric health care providers who are experts in treating children with Wilms tumor or other childhood kidney tumors and who specialize in certain areas of medicine. These may include the following specialists:

- Pediatrician.
- Pediatric surgeon or urologist.
- Radiation oncologist.
- Rehabilitation specialist.
- Pediatric nurse specialist.
- Social worker.

### Six types of treatment are used:

#### Surgery

Two types of surgery are used to treat kidney tumors:

- Nephrectomy: Wilms tumor and other childhood kidney tumors are usually treated with nephrectomy (surgery to remove the whole kidney). Nearby lymph nodes may also be removed and checked for signs of cancer. Sometimes a kidney transplant (surgery to remove the kidney and replace it with a kidney from a donor) is done when the cancer is in both kidneys and the kidneys are not working well.
- Partial nephrectomy: If cancer is found in both kidneys or is likely to spread to both kidneys, surgery may include a partial nephrectomy (removal of the cancer in the kidney and a small amount of normal tissue around it). Partial nephrectomy is done to keep as much of the kidney working as possible. A partial nephrectomy is also called renal-sparing surgery.

After the doctor removes all the cancer that can be seen at the time of the surgery, some patients may be given chemotherapy or radiation therapy after surgery to kill any cancer cells that are left. Treatment given after the surgery, to lower the risk that the cancer will come back, is called adjuvant therapy. Sometimes, a second-look surgery is done to see if cancer remains after chemotherapy or radiation therapy.

Sometimes the tumor cannot be removed by surgery for one of the following reasons:

- The tumor is too close to important organs or blood vessels.
- The tumor is too large to remove.
- The cancer is in both kidneys, unless the tumors are very small.
- There is a blood clot in the vessels near the liver.
- The patient has trouble breathing because cancer has spread to the lungs.

In this case, a biopsy is done first. Then chemotherapy is given to reduce the size of the tumor before surgery, in order to save as much healthy tissue as possible and lessen problems after surgery. This is called neoadjuvant chemotherapy. Radiation therapy is given after surgery.

#### Radiation therapy

Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer.

External radiation therapy is used to treat Wilms tumor and other childhood kidney tumors.

#### Chemotherapy

Chemotherapy is a cancer treatment that uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. When chemotherapy is taken by mouth or injected into a vein or muscle, the drugs enter the bloodstream and can reach cancer cells throughout the body (systemic chemotherapy). Combination chemotherapy is treatment using two or more anticancer drugs.

Systemic chemotherapy is used to treat Wilms tumor and other childhood kidney tumors.

Sometimes chemotherapy is given to reduce the size of the tumor before surgery, in order to save as much healthy tissue as possible and lessen problems after surgery. This is called neoadjuvant chemotherapy.

See Drugs Approved for Wilms Tumor and Other Childhood Kidney Cancers (https://www.cancer.gov/about-cancer/treatment/drugs/wilms-tumor) for more information.

#### Immunotherapy

Immunotherapy is a treatment that uses the patient's immune system to fight cancer. Substances made by the body or made in a laboratory are used to boost, direct, or restore the body's natural defenses against cancer. This cancer treatment is a type of biologic therapy.

Interferon and interleukin-2 (IL-2) are types of immunotherapy used to treat childhood renal cell cancer. Interferon may slow tumor growth and may help kill the cancer cells. IL-2 boosts the growth and activity of many immune cells, especially lymphocytes (a type of white blood cell). Lymphocytes can attack and kill cancer cells.

#### High-dose chemotherapy with stem cell rescue

High doses of chemotherapy are given to kill cancer cells. Healthy cells, including blood-forming cells, are also destroyed by the cancer treatment. Stem cell rescue is a treatment to replace the blood-forming cells. Stem cells (immature blood cells) are removed from the blood or bone marrow of the patient and are frozen and stored. After the patient completes chemotherapy, the stored stem cells are thawed and given back to the patient through an infusion. These stem cells grow into (and restore) the body's blood cells.

High-dose chemotherapy with stem cell rescue may be used to treat rhabdoid tumor of the kidney or recurrent Wilms tumor.

#### Targeted therapy

Targeted therapy is a type of treatment that uses drugs or other substances to identify and attack specific cancer cells. Targeted therapies usually cause less harm to normal cells than chemotherapy or radiation therapy do. Targeted therapy used to treat childhood kidney tumors may include the following:

- Tyrosine kinase inhibitors: This targeted therapy blocks signals that cancer cells need to grow and divide.
  - Larotrectinib and entrectinib may be used to treat congenital mesoblastic nephroma with a certain gene change that cannot be removed by surgery, has spread to other parts of the body, or has continued to grow during treatment. This combination is also being studied to treat congenital mesoblastic nephroma that has come back after treatment.
  - Sunitinib or cabozantinib may be used to treat renal cell carcinoma.
  - Axitinib is being studied in combination with a monoclonal antibody (nivolumab) to treat renal cell carcinoma that cannot be removed by surgery or has spread to other parts of the body.
- Histone methyltransferase inhibitors: This targeted therapy may keep the cancer cells from growing and dividing. Tazemetostat is being studied to treat rhabdoid tumor of the kidney that does not respond or has come back after treatment.
- Monoclonal antibody therapy: Monoclonal antibodies are immune system proteins made in the laboratory to treat many diseases, including cancer. As a cancer treatment, these antibodies can attach to a specific target on cancer cells or other cells that may help cancer cells grow. The antibodies are able to then kill the cancer cells, block their growth, or keep them from spreading. Monoclonal antibodies are given by infusion. They may be used alone or to carry drugs, toxins, or radioactive material directly to cancer cells. Nivolumab or a combination of nivolumab and a tyrosine kinase inhibitor (axitinib) are being studied to treat renal cell carcinoma that cannot be removed by surgery or has spread to other parts of the body.
  monoclonal antibodies: how monoclonal antibodies treat cancer
  How do monoclonal antibodies work to treat cancer? This video shows how monoclonal antibodies, such as trastuzumab, pembrolizumab, and rituximab, block molecules cancer cells need to grow, flag cancer cells for destruction by the body’s immune system, or deliver harmful substances to cancer cells.
  YouTube (https://www.youtube.com/watch?v=dxnjAc-rqz8)

Other targeted therapies are being studied for the treatment of childhood kidney tumors that have recurred (come back).

### New types of treatment are being tested in clinical trials.

Information about clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for Wilms tumor and other childhood kidney tumors may cause side effects.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Side effects from cancer treatment that begin after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include the following:

- Physical problems, such as problems with the heart, the kidney, or during pregnancy.
- Infertility.
- Changes in mood, feelings, thinking, learning, or memory.
- Second cancers (new types of cancer), such as leukemias, cancer of the gastrointestinal tract, or breast cancer.

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the effects cancer treatment can have on your child. (See the PDQ summary about Late Effects of Treatment for Childhood Cancer for more information).

Clinical trials are being done to find out if lower doses of chemotherapy and radiation can be used to lessen the late effects of treatment without changing how well the treatment works.

Monitoring for late effects involving the kidneys in patients with Wilms tumor and related conditions includes the following:

- Children with WAGR syndrome are monitored throughout their lives because they are at increased risk of developing hypertension and kidney disease.
- Children with Wilms tumor and abnormal genitourinary system are monitored because they are at increased risk of late kidney failure.
- Patients with Wilms tumor and aniridia without abnormal genitourinary system are at lower risk but are monitored for kidney disease or kidney failure.

### Patients may want to think about taking part in a clinical trial.

For some patients, taking part in a clinical trial may be the best treatment choice. Clinical trials are part of the cancer research process. Clinical trials are done to find out if new cancer treatments are safe and effective or better than the standard treatment.

Many of today's standard treatments for cancer are based on earlier clinical trials. Patients who take part in a clinical trial may receive the standard treatment or be among the first to receive a new treatment.

Patients who take part in clinical trials also help improve the way cancer will be treated in the future. Even when clinical trials do not lead to effective new treatments, they often answer important questions and help move research forward.

### Patients can enter clinical trials before, during, or after starting their cancer treatment.

Some clinical trials only include patients who have not yet received treatment. Other trials test treatments for patients whose cancer has not gotten better. There are also clinical trials that test new ways to stop cancer from recurring (coming back) or reduce the side effects of cancer treatment.

Clinical trials are taking place in many parts of the country. Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

### Follow-up tests may be needed.

As your child goes through treatment, they will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

## Treatment Options for Wilms Tumor

For information about the treatments listed below, see the Treatment Option Overview section.

### Stage I Wilms Tumor

Treatment of stage I Wilms tumor with favorable histology may include:

- Nephrectomy with removal of lymph nodes, followed by combination chemotherapy.
- Nephrectomy with removal of lymph nodes.

Treatment of stage I anaplastic Wilms tumor may include:

- Nephrectomy with removal of lymph nodes, followed by combination chemotherapy and radiation therapy to the flank area (either side of the body between the ribs and hipbone).

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Stage II Wilms Tumor

Treatment of stage II Wilms tumor with favorable histology may include:

- Nephrectomy with removal of lymph nodes, followed by combination chemotherapy.

Treatment of stage II anaplastic Wilms tumor may include:

- Nephrectomy with removal of lymph nodes, followed by radiation therapy to the abdomen and combination chemotherapy.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Stage III Wilms Tumor

Treatment of stage III Wilms tumor with favorable histology may include:

- Nephrectomy with removal of lymph nodes, followed by radiation therapy to the abdomen and combination chemotherapy.

Treatment of stage III anaplastic Wilms tumor may include:

- Nephrectomy with removal of lymph nodes, followed by radiation therapy to the abdomen and combination chemotherapy.
- Combination chemotherapy, followed by nephrectomy with removal of lymph nodes, followed by radiation therapy to the abdomen.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Stage IV Wilms Tumor

Treatment of stage IV Wilms tumor with favorable histology may include:

- Nephrectomy with removal of lymph nodes, followed by radiation therapy to the abdomen and combination chemotherapy. If cancer has spread to other parts of the body, patients will also receive radiation therapy to those areas.

Treatment of stage IV anaplastic Wilms tumor may include:

- Nephrectomy with removal of lymph nodes, followed by radiation therapy to the abdomen and combination chemotherapy. If cancer has spread to other parts of the body, patients will also receive radiation therapy to those areas.
- Combination chemotherapy given before nephrectomy with removal of lymph nodes, followed by radiation therapy to the abdomen. If cancer has spread to other parts of the body, patients will also receive radiation therapy to those areas.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Stage V Wilms Tumor and patients at high risk of developing bilateral Wilms tumor

Treatment of stage V Wilms tumor (bilateral) may be different for each patient and may include:

- Combination chemotherapy to shrink the tumor, followed by repeat imaging at 4 to 8 weeks to decide on further therapy (partial nephrectomy, biopsy, continued chemotherapy, and/or radiation therapy).
- A biopsy of the kidneys is followed by combination chemotherapy to shrink the tumor. A second surgery is done to remove as much of the cancer as possible. This may be followed by more chemotherapy and/or radiation therapy if cancer remains after surgery.

If a kidney transplant is needed because of kidney problems, it is usually delayed until 1 to 2 years after treatment is completed and there are no signs of cancer.

(See the Treatment of Recurrent Childhood Kidney Tumors section of this summary for information about recurrent disease.)

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment Options for Other Childhood Kidney Tumors

For information about the treatments listed below, see the Treatment Option Overview section.

### Renal Cell Cancer (RCC)

Treatment of renal cell cancer may include:

- Surgery, which may be:
  - nephrectomy with removal of lymph nodes; or
  - partial nephrectomy with removal of lymph nodes.
- Immunotherapy (interferon or interleukin-2) for cancer that has spread to other parts of the body.
- Targeted therapy (tyrosine kinase inhibitors, such as sunitinib or cabozantinib) for cancer that has spread to other parts of the body.
- A clinical trial of targeted therapy with monoclonal antibody therapy (nivolumab) or a combination of nivolumab with a tyrosine kinase inhibitor (axitinib) for cancer that has a certain gene change and cannot be removed by surgery or has spread to other parts of the body.

See the PDQ summary about Renal Cell Cancer Treatment for more information.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Rhabdoid Tumor of the Kidney

There is no standard treatment for rhabdoid tumor of the kidney. Treatment may include:

- A combination of surgery, chemotherapy, and/or radiation therapy.
- High-dose chemotherapy with or without stem cell rescue.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Clear Cell Sarcoma of the Kidney

Treatment of clear cell sarcoma of the kidney may include:

- Nephrectomy with removal of lymph nodes followed by combination chemotherapy (including doxorubicin) and radiation therapy to the abdomen.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Congenital Mesoblastic Nephroma

Treatment of stages I, II, and certain patients with stage III congenital mesoblastic nephroma may include:

- Surgery.

Treatment for certain patients with stage III congenital mesoblastic nephroma may include:

- Surgery followed by chemotherapy.

A clinical trial of targeted therapy with a tyrosine kinase inhibitor (larotrectinib) for cancer that has a certain gene change and has not been treated.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Ewing Sarcoma of the Kidney

There is no standard treatment for Ewing sarcoma of the kidney. Treatment may include:

- A combination of surgery, chemotherapy, and radiation therapy.

It may also be treated in the same way that Ewing sarcoma is treated. See the PDQ summary about Ewing Sarcoma Treatment for more information.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Primary Renal Myoepithelial Carcinoma

There is no standard treatment for primary renal myoepithelial carcinoma. Treatment may include:

- A combination of surgery, chemotherapy, and radiation therapy.

### Cystic Partially Differentiated Nephroblastoma

Treatment of cystic partially differentiated nephroblastoma may include:

- Surgery that may be followed by chemotherapy.

### Multilocular Cystic Nephroma

Treatment of multilocular cystic nephroma usually includes:

- Surgery.

### Primary Renal Synovial Sarcoma

Treatment of primary renal synovial sarcoma usually includes:

- Chemotherapy.

### Anaplastic Sarcoma of the Kidney

There is no standard treatment for anaplastic sarcoma of the kidney. Treatment is usually the same treatment given for anaplastic Wilms tumor.

### Nephroblastomatosis (Diffuse Hyperplastic Perilobar Nephroblastomatosis)

The treatment of nephroblastomatosis depends on the following:

- Whether the child has abnormal groups of cells in one or both kidneys.
- Whether the child has Wilms tumor in one kidney and groups of abnormal cells in the other kidney.

Treatment of nephroblastomatosis may include:

- Chemotherapy followed by nephrectomy. Sometimes a partial nephrectomy may be done to keep as much kidney function as possible.

## Treatment of Recurrent Childhood Kidney Tumors

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of recurrent Wilms tumor may include:

- Combination chemotherapy, surgery, and radiation therapy.
- Combination chemotherapy and radiation therapy, followed by stem cell rescue, using the child's own blood stem cells.
- A clinical trial that checks a sample of the patient's tumor for certain gene changes. The type of targeted therapy that will be given to the patient depends on the type of gene change.
- A clinical trial of combination chemotherapy for patients with relapsed favorable histology Wilms tumor.

Treatment of recurrent rhabdoid tumor of the kidney may include:

- A clinical trial that checks a sample of the patient's tumor for certain gene changes. The type of targeted therapy that will be given to the patient depends on the type of gene change.

Treatment of recurrent clear cell sarcoma of the kidney may include:

- Combination chemotherapy, surgery to remove the tumor (if possible), with or without radiation therapy.
- A clinical trial that checks a sample of the patient's tumor for certain gene changes. The type of targeted therapy that will be given to the patient depends on the type of gene change.

Treatment of recurrent congenital mesoblastic nephroma may include:

- Combination of chemotherapy, surgery, and radiation therapy.
- Targeted therapy such as larotrectinib or entrectinib.
- A clinical trial that checks a sample of the patient's tumor for certain gene changes. The type of targeted therapy that will be given to the patient depends on the type of gene change.
- A clinical trial of targeted therapy (LOXO-101 or entrectinib).

Treatment of other recurrent childhood kidney tumors is usually within a clinical trial.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Wilms Tumor and Other Childhood Kidney Tumors

For more information from the National Cancer Institute about Wilms tumor and other childhood kidney tumors, see the following:

- Kidney Cancer Home Page (https://www.cancer.gov/types/kidney)
- Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
- Drugs Approved for Wilms Tumor and Other Childhood Kidney Cancers (https://www.cancer.gov/about-cancer/treatment/drugs/wilms-tumor)
- Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
- Targeted Cancer Therapies (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)
- Genetic Testing for Inherited Cancer Susceptibility Syndromes (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)

For more childhood cancer information and other general cancer resources, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Late Effects of Treatment for Childhood Cancer
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of Wilms tumor and other childhood kidney tumors. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Wilms Tumor and Other Childhood Kidney Tumors Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/kidney/patient/wilms-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389390]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).